# Cancer Pain (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of pain. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General Information About Cancer Pain

Key Points for This Section
- Cancer, cancer treatment, or diagnostic tests may cause you pain.
- Pain can be managed before, during, and after tests and procedures.
- Different cancer treatments may cause specific types of pain.
- Peripheral neuropathy is a type of pain that can be caused by chemotherapy.
- Cancer pain may continue after treatment ends.
- Pain control can improve your quality of life.
- Each patient needs a personal plan to control cancer pain.

### Cancer, cancer treatment, or diagnostic tests may cause you pain.

Pain is one of the most common symptoms in cancer patients. Pain can be caused by cancer, cancer treatment, or a combination of factors. Tumors, surgery, intravenous chemotherapy, radiation therapy, targeted therapy, therapies such as bisphosphonates, and diagnostic procedures may cause you pain.

Younger patients are more likely to have cancer pain and pain flares than older patients. Patients with advanced cancer have more severe pain, and many cancer survivors have pain that continues after cancer treatment ends.

This summary is about ways to control cancer pain in adults.

### Pain can be managed before, during, and after tests and procedures.

Some tests and procedures are painful. It helps to start pain control before a procedure begins. Some drugs may be used to help you feel calm or fall asleep. Therapies such as imagery or relaxation can also help control pain and anxiety related to treatment. To help lower your anxiety, ask about the test before it begins so you know what to expect. Have a family member or friend stay with you during the procedure.

### Different cancer treatments may cause specific types of pain.

Patients may have different types of pain from the treatments they receive, including:

- Postoperative pain.
- Spasms, stinging, and itching caused by intravenous chemotherapy.
- Mucositis caused by chemotherapy or targeted therapy.
- Ostealgia (bone pain) caused by filgrastim or pegfilgrastim, which are granulocyte colony-stimulating factors that help the body make more white blood cells.
- Peripheral neuropathy caused by chemotherapy or targeted therapy.
- Pain in joints and muscles caused by paclitaxel or aromatase inhibitor therapy.
- Osteonecrosis of the jaw caused by bisphosphonates given for cancer that has spread to the bone.
- Avascular necrosis caused by long-term use of corticosteroids.
- Pain syndromes caused by radiation therapy, including:
  - Pain from brachytherapy.
  - Pain from lying in the same position during treatment.
  - Mucositis (inflammation of the mucous membranes in areas that were treated with radiation).
  - Dermatitis.
  - Pain flares.

### Peripheral neuropathy is a type of pain that can be caused by chemotherapy.

Peripheral neuropathy is a nerve problem that can cause pain, numbness, and tingling in the hands and feet. Patients on chemotherapy may have chemotherapy-induced peripheral neuropathy (CIPN). In some patients, CIPN may continue after chemotherapy has ended.

Studies of drugs and natural products used to treat CIPN have shown mixed results. Duloxetine is a drug that has been studied to treat CIPN.

Studies of acupuncture for CIPN have been reported. For more information about these studies, see the Chemotherapy-induced peripheral neuropathy section in Acupuncture.

### Cancer pain may continue after treatment ends.

Pain that is severe or continues after cancer treatment ends increases the risk of anxiety and depression. If you feel depressed or have anxiety, your pain may feel worse and make it harder to control. Some patients are unable to work because of the pain.

### Pain control can improve your quality of life.

Pain can be controlled in most patients who have cancer. Although cancer pain cannot always be relieved completely, there are ways to lessen pain in most patients. Pain control can improve your quality of life during cancer treatment and after it ends.

### Each patient needs a personal plan to control cancer pain.

Each person's diagnosis, cancer stage, response to pain, and personal likes and dislikes are different. For this reason, each patient needs a personal plan to control cancer pain. You, your family, and your health care team can work together to manage your pain. As part of your pain control plan, your health care provider can give you and your family members written instructions to manage your pain at home. Ask your health care provider who you should call if you have questions about your pain.

## Assessment of Cancer Pain

Key Points for This Section
- Your health care team will ask you about your pain to determine the best treatment.
- Physical and neurological exams will be done to help plan pain control.

### Your health care team will ask you about your pain to determine the best treatment.

It's important that the cause of your pain is found early and treated quickly. Your health care team will help you measure pain levels often, including at the following times:

- After you start cancer treatment.
- After you start a new pain treatment.
- When you have new pain.

To learn about your pain, the health care team will ask you the following questions:

- When did the pain start?
- How long does the pain last?
- Where is the pain? You will be asked to show exactly where the pain is on your body or on a drawing of a body.
- How strong is the pain? You will be asked to rate your pain between 1-10, with 10 being the strongest.
- Have there been changes in where or when the pain occurs?
- What makes the pain better or worse?
- Is the pain worse during certain times of the day or night?
- Is there breakthrough pain?
- Do you have trouble sleeping, or do you feel tired, depressed, or anxious?
- Does pain get in the way of activities of daily life, such as when you eat, bathe, or move around?

Your health care team will also review your health history, including the following information:

- Past and current pain treatments.
- Prognosis.
- Other conditions you may have, such as kidney, liver, or heart disease.
- Past and current use of nicotine, alcohol, or sleeping pills.
- Personal or family history of substance use disorder.
- Personal history of mental health disorders or abuse.
- Your choices for your pain control plan.

The information you give your health care team will be used to decide how to help relieve your pain. Treatment may include drugs or non-drug therapies. In some cases, patients are referred to pain or palliative care specialists. Your health care team will work with you to decide whether the benefits of treatment outweigh any risks. They will also let you know how much relief to expect from your pain treatment. Your doctor will continue to ask you how well your treatment is working and make changes if needed.

A family member or caregiver may be asked to give answers for a patient who has problems with speech, language, or understanding.

### Physical and neurological exams will be done to help plan pain control.

The following exams will be done:

- Physical exam: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual.
- Neurological exam: A series of questions and tests to check the brain, spinal cord, and nerve function. The exam checks your mental status, coordination, and ability to walk normally, and how well the muscles, senses, and reflexes work. This may also be called a neuro exam or a neurologic exam.

Your health care team will also assess your psychological, social, and spiritual needs.

## Using Drugs to Control Cancer Pain

Key Points for This Section
- Drugs will be given based on whether your pain is mild, moderate, or severe.
- Acetaminophen and nonsteroidal anti-inflammatory drugs (NSAIDs) may be used to relieve mild pain.
- Opioids are used to relieve moderate to severe pain.
  - Most patients with cancer pain will receive opioids on a regular schedule.
  - Opioids are given in different ways.
  - There are common side effects caused by opioids.
- Other drugs may be added to help treat your pain.

### Drugs will be given based on whether your pain is mild, moderate, or severe.

Your doctor will prescribe drugs to help relieve your pain. These drugs need to be taken at scheduled times to keep a constant level of the drug in the body to help keep the pain from coming back. Drugs may be taken by mouth or given in other ways, such as by infusion or injection.

Your doctor may prescribe extra doses of a drug for pain that occurs between scheduled doses of the drug. The doctor will adjust the drug dose for your needs.

A scale from 0 to 10 is used to measure how severe the pain is and decide which pain medicine to use. On this scale:

- 0 means no pain.
- 1 to 3 means mild pain.
- 4 to 6 means moderate pain.
- 7 to 10 means severe pain.

Other pain scales that use happy or sad faces may be used for those who have trouble giving their pain a number. These scales are useful for adults who have trouble with memory or thinking, and with young children.

### Acetaminophen and nonsteroidal anti-inflammatory drugs (NSAIDs) may be used to relieve mild pain.

Acetaminophen and NSAIDs help relieve mild pain. They may be given with opioids for moderate to severe pain.

Pain relievers of this type include:

- Celecoxib.
- Diclofenac.
- Ibuprofen.
- Ketoprofen.
- Ketorolac.

Side effects of NSAIDs include stomach, kidney, heart, and blood problems. Patients, especially older patients, who take acetaminophen or NSAIDs need to be closely watched for side effects. For more information, see Treating Cancer Pain in Older Patients.

### Opioids are used to relieve moderate to severe pain.

Opioids work well to relieve moderate to severe pain. Some patients with cancer stop getting pain relief from opioids if they take them for a long time. This is called tolerance. Larger doses or a different opioid may be needed if your body stops responding to the same dose. Tolerance of an opioid is a physical dependence on it. This is not the same as addiction (psychological dependence).

Since 1999, the number of prescriptions written for opioids and the number of deaths caused by drug overdose in the United States have increased. Although most patients who are prescribed opioids for cancer pain use them safely, some patients may become addicted to opioids. Your doctor will monitor your opioid doses so that you are treated for pain safely.

There are several types of opioids:

- Buprenorphine.
- Codeine.
- Fentanyl.
- Hydrocodone.
- Hydromorphone.
- Methadone.
- Morphine (the most common opioid for cancer pain).
- Oxycodone.
- Oxymorphone.
- Tapentadol.
- Tramadol.

The doctor will prescribe drugs and the times they should be taken to best control your pain. It is important that patients and family caregivers know how to safely use, store, and dispose of opioids.

#### Most patients with cancer pain will receive opioids on a regular schedule.

Opioids are given on a regular schedule to help relieve the pain and keep it from getting worse. The amount of time between doses depends on which opioid you take. The best dose is the amount of opioid that controls your pain with the fewest side effects. If opioid tolerance does occur (the opioid no longer works at the dose you are given), the dose may need to be increased or a different opioid may be prescribed.

There is evidence that patients who are prescribed long-acting opioids (for example, medications that work for 8,12, or 24 hours), are more likely to take them as directed.

#### Opioids are given in different ways.

Opioids may be given by the following ways:

- Mouth: If your stomach and intestines work normally, medicine is usually taken by mouth. Opioids given orally are easy to use and are usually low-cost. Oral opioids are absorbed when placed under the tongue (sublingual route) or on the inside of the cheek (buccal route).
- Rectum: If you cannot take opioids by mouth, they may be given as rectal suppositories.
- Skin patches: Opioid patches are placed on the skin (transdermal route).
- Nose spray: Opioids may be given in the form of a nasal spray.
- Intravenous (IV) line: Opioids are given into a vein when simpler and less costly methods cannot be used, don't work, or are not wanted by the patient. Patient-controlled analgesia (PCA) pumps are one way to control pain through your IV line. A PCA pump allows you to control the amount of drug that is used. With a PCA pump, you can receive a preset opioid dose by pressing a button on a pump that is connected to a small tube. Once the pain is controlled, the doctor may prescribe regular opioid doses based on the amount you used with the PCA pump.
- Subcutaneous injection: Opioids are injected into the fatty layer of tissue just under the skin.
- Intraspinal injection: Opioids are injected into the fluid around the spinal cord. These may be combined with a local anesthetic to help some patients who have pain that is hard to control.

#### There are common side effects caused by opioids.

Your doctor will discuss the side effects with you before opioid treatment begins and will watch you for side effects. The following are the most common side effects:

- Nausea.
- Drowsiness.
- Constipation.

Nausea and drowsiness most often occur when opioid treatment is first started and usually get better within a few days.

Opioids slow down the muscle contractions and movement in the stomach and intestines, which can cause hard stools. To keep the stool soft and prevent constipation, it's important to drink plenty of fluids, increase fiber in the diet, and get regular exercise. Unless there are problems such as a blocked bowel or diarrhea, you will be given a treatment plan to prevent constipation and other digestive problems while taking opioids.

Other side effects of opioid treatment include the following:

- Dry mouth.
- Vomiting.
- Low blood pressure.
- Dizziness.
- Trouble sleeping.
- Trouble thinking clearly.
- Sedation.
- Delirium or hallucinations.
- Muscle jerks.
- Seizures.
- Hyperalgesia.
- Trouble urinating.
- Breathing problems that may get worse with sleep apnea, obesity, or when taking opioids with sedatives.
- Severe itching.
- Problems with sexual function.
- Hot flashes.
- Depression.
- Hypoglycemia.

Opioids are more likely to cause damage to the nervous system in patients with the following risk factors:

- Taking morphine or codeine.
- Older age.
- Kidney problems.
- Infection.
- Dehydration.

Talk to your doctor about side effects that bother you or become severe. Your doctor may decrease the dose of the opioid, change to a different opioid, or change the way the opioid is given to help decrease the side effects. For more information about coping with these side effects, see the following:

- Constipation and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/constipation)
- Nausea and Vomiting and Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/side-effects/nausea-vomiting)

### Other drugs may be added to help treat your pain.

Other drugs may be given while you take opioids for pain relief. These are drugs that help the opioids work better, treat symptoms, and relieve certain types of pain. The following types of drugs may be used:

- Antidepressants.
- Anticonvulsants.
- Local anesthetics.
- Corticosteroids.
- Bisphosphonates and denosumab.

Patients will not always respond in the same way to these drugs. Side effects are common and should be reported to your doctor.

Bisphosphonates (pamidronate, zoledronic acid, and ibandronate) are drugs that may be given when cancer has spread to the bones. They are given as an intravenous infusion and combined with other treatments to decrease pain and reduce risk of broken bones. However, bisphosphonates sometimes cause severe side effects. Talk to your doctor if you have severe muscle or bone pain. Bisphosphonate therapy may need to be stopped.

The use of bisphosphonates is also linked to the risk of bisphosphonate-associated osteonecrosis (BON). For more information, see Oral Complications of Cancer Therapies.

Denosumab is another drug that may be used when cancer has spread to the bones. It is given as a subcutaneous injection and may help prevent and relieve pain.

## Other Treatments for Cancer Pain

Key Points for This Section
- Nerve blocks
- Neurological treatments
- Cordotomy
- Palliative care
- Radiation therapy
  - External radiation therapy
  - Radiopharmaceuticals
- Physical medicine and rehabilitation
- Integrative therapies

Most cancer pain can be controlled with drugs, but some patients have too many side effects from drugs or have pain in a certain part of the body that needs to be treated in a different way. Talk to your doctor to help decide which methods work best to relieve your pain. Other treatments include nerve blocks, surgery, radiation therapy and palliative care.

### Nerve blocks

A nerve block is the injection of either a local anesthetic or other drug into or around a nerve to block pain. Nerve blocks help control pain that can't be controlled in other ways. Nerve blocks may also be used to find where the pain is coming from, to predict how the pain will respond to long-term treatments, and to prevent pain after certain procedures.

### Neurological treatments

Surgery can be done to insert a device that delivers drugs or stimulates the nerves with mild electric current.

### Cordotomy

Cordotomy is a less common surgery that is used to relieve pain by cutting certain nerves in the spinal cord. This blocks pain and hot/cold feelings. This procedure may be chosen for patients who are near the end of life and have severe pain that cannot be relieved in other ways.

### Palliative care

Certain patients are helped by palliative care services. Palliative care providers may also be called supportive care providers. They work in teams that include doctors, nurses, mental health specialists, social workers, chaplains, pharmacists, and dietitians. Some of the goals of palliative care are to:

- Improve quality of life for patients and their families.
- Manage pain and non-pain symptoms.
- Support patients who need higher doses of opioids, have a history of substance use disorder, or are coping with emotional and social problems.

### Radiation therapy

Radiation therapy is used to relieve pain in patients with skin lesions, tumors, or cancer that has spread to the bone. This is called palliative radiation therapy. It may be given as local therapy directly to the tumor or to larger areas of the body. Radiation therapy helps drugs and other treatments work better by shrinking tumors that cause pain. Radiation therapy may help patients with bone pain move more freely and with less pain.

The following types of radiation therapy may be used:

#### External radiation therapy

External radiation therapy uses a machine outside the body to send high-energy x-rays or other types of radiation toward the area of the body with cancer. External radiation therapy relieves pain from cancer that has spread to the bone. Radiation therapy may be given in a single dose or divided into several smaller doses given over time. The decision to have a single or divided dose may depend on how easy it is to get the treatments and how much they cost. Some patients who find little or no pain relief from first-time radiation therapy may benefit from repeated radiation therapy.

Patients may have a pain flare after receiving palliative radiation therapy for cancer that has spread to the bone, but this side effect is only temporary.

#### Radiopharmaceuticals

Radiopharmaceuticals are drugs that have a radioactive substance that may be used to diagnose or treat disease, including cancer. Radiopharmaceuticals may also be used to relieve pain from cancer that has spread to the bone. A single dose of a radioactive agent injected into a vein may relieve pain when cancer has spread to several areas of bone and/or when there are too many areas to treat with external radiation therapy.

### Physical medicine and rehabilitation

Patients with cancer and pain may lose their strength, freedom of movement, and ability to manage their daily activities. Physical therapy or occupational therapy may help these patients.

Physical medicine uses physical methods, such as exercise and machines, to prevent and treat disease or injury.

Some patients may be referred to a physiatrist (a doctor who specializes in physical medicine) who can develop a personal plan for them. Some physiatrists are also trained in procedures to treat and manage pain.

### Integrative therapies

Complementary and alternative therapies combined with standard treatment may be used to treat pain. They are also called integrative therapies. Acupuncture, support groups, and hypnosis are a few integrative therapies that have been used to relieve pain.

## Treating Cancer Pain in Older Patients

Key Points for This Section
- Certain factors affect cancer pain treatment in older adults.
  - Older patients may be prescribed more than one drug.
  - Doses start at lower levels.
  - Side effects from drugs are more likely in older patients.
  - There is a risk of undertreatment (not receiving enough treatment) in older patients.

### Certain factors affect cancer pain treatment in older adults.

Some problems are more likely in patients 65 years and older. For caregivers of these patients, the following should be kept in mind:

#### Older patients may be prescribed more than one drug.

Older patients may have more than one chronic disease and take several drugs for different conditions. This can increase the risk of drug interactions. Drugs taken together can change how they work in the body and can affect the patient's chronic diseases.

#### Doses start at lower levels.

Pain medicine is started at lower doses in older patients and adjusted slowly to allow for differences in their pain threshold, pain expression, and effects on physical and mental function. Lower doses given to older patients may provide better pain relief that lasts longer than in younger patients.

#### Side effects from drugs are more likely in older patients.

Older patients should be watched closely for side effects from opioids and NSAIDs. See common side effects caused by opioids for more information. Other drugs may be given to avoid side effects from certain NSAIDs:

- Acetaminophen.
- Proton pump inhibitors (given with NSAIDs).
- Topical NSAIDs.
- COX-2-selective NSAIDs (NSAIDs that cause fewer problems with the stomach and intestines).

#### There is a risk of undertreatment (not receiving enough treatment) in older patients.

Undertreatment in older patients may occur for the following reasons:

- Patients do not report their pain.
- Patients are not able to talk about the pain they have.
- The doctor is concerned about side effects or changes in patient behavior that may be caused by pain medicine.

Poor pain control may cause other problems in older patients, including the following:

- Reduced physical or mental function.
- Slow recovery.
- Changes in appetite or sleep.
- Increased need for care and assistance with health problems.

Treating depression in patients can also help with pain treatment.

## To Learn More About Cancer Pain

For more information from the National Cancer Institute about cancer pain, see the following:

- Pain and Cancer Treatment: Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects/pain)
- Cancer Pain Control: Support for People with Cancer (https://www.cancer.gov/publications/patient-education/pain-control)
- The Opioid Epidemic and Cancer Pain Management (https://www.cancer.gov/news-events/cancer-currents-blog/2018/opioid-crisis-cancer-pain-paice)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the causes and treatment of pain. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Cancer Pain. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/pain/pain-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389322]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).